# Cigarette Smoking: Health Risks and How to Quit (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the prevention and cessation of cigarette smoking and the control of tobacco use. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Note: The Overview section summarizes the published evidence on this topic. The rest of the summary describes the evidence in more detail.

A separate PDQ summary on Levels of Evidence for Cancer Screening and Prevention Studies is also available.

The cancer prevention summaries in PDQ refer to cancer prevention, defined as a reduction in the incidence of cancer. The PDQ includes summaries generally classified by histological type of cancer, especially when there are known risk factors for the specific types of cancer. This summary addresses a specific risk factor, tobacco use, which is associated with a large number of different cancers (and other chronic diseases) and unequivocally contains human carcinogens.[1] The focus of this summary is on clinical interventions by health professionals that decrease the use of tobacco.

### Effects of Smoking Cessation

Based on solid evidence, cigarette smoking causes cancers of the lung, oral cavity and pharynx, larynx, esophagus, bladder, kidney, pancreas, stomach, uterine cervix, colon and rectum, liver, and acute myeloid leukemia.[2] Smoking avoidance and smoking cessation result in decreased incidence and mortality from cancer.[3]

Description of the Evidence
- Study Design: Evidence obtained from a randomized controlled trial (RCT).
- Internal Validity: Good.
- Consistency: Good.
- Magnitude of Effects on Health Outcomes: The relative risk (RR) of several cancers is much greater in cigarette smokers compared with nonsmokers (depending on the anatomical site of the cancer and the intensity and duration of smoking, the RR can range from twofold to tenfold or greater in smoking populations). A reduction of 15% is seen in the RR of all-cause mortality in heavy smokers subjected to intensive clinical cessation interventions.
- External Validity: Good.

### Physician or Nurse Advice and Smoking Cessation

Based on solid evidence, brief advice from a physician or nurse to stop smoking improves smoking cessation rates.

Description of the Evidence
- Study Design: Evidence obtained from RCTs.
- Internal Validity: Good.
- Consistency: Good.
- Magnitude of Effects on Health Outcomes: Physician advice improves cessation rates (RR, 1.66; 95% confidence interval [CI], 1.42–1.94).[4] Nurse advice improves cessation rates (RR, 1.29; 95% CI, 1.21–1.38).[5]
- External Validity: Good.

### Counseling and Smoking Cessation

Based on solid evidence, counseling by a health professional improves smoking cessation rates.

Description of the Evidence
- Study Design: Evidence obtained from RCTs.
- Internal Validity: Good.
- Consistency: Good.
- Magnitude of Effects on Health Outcomes: Counseling improves cessation rates (odds ratio [OR], 1.44; 95% credibility interval, 1.22–1.70).[6]
- External Validity: Good.

### Pharmacological Treatment and Smoking Cessation

Based on solid evidence, drug treatments, including nicotine replacement therapies (NRTs) (gum, patch, spray, lozenge, and inhaler), selected antidepressant therapies (e.g., bupropion hydrochloride [HCI]), and nicotinic receptor agonist therapy (varenicline), result in better smoking cessation rates than placebo.

Description of the Evidence
- Study Design: Evidence obtained from RCTs.
- Internal Validity: Good.
- Consistency: Good.
- Magnitude of Effects on Health Outcomes: NRTs, alone or in combination, improve cessation rates over placebo after 6 months (RR, 1.55; 95% CI, 1.49–1.61).[7] Treatment with bupropion HCI improves cessation rates over placebo after 6 months (OR, 1.94; 95% CI, 1.72–2.19; RR, 1.60; 95% CI, 1.49–1.72).[8] Varenicline therapy treatment improves cessation rates over placebo after 6 months (RR, 2.32; 95% CI, 2.15–2.51).[9]
- External Validity: Good.

### Pharmacological Treatment Combined With Counseling and Smoking Cessation

Based on solid evidence, drug treatments combined with counseling by a health professional result in better smoking cessation rates than drug treatments with minimal or no counseling support.

Description of the Evidence
- Study Design: Evidence obtained from RCTs.
- Internal Validity: Good.
- Consistency: Good.
- Magnitude of Effects on Health Outcomes: Drug treatments combined with counseling (behavioral support) improve cessation rates over drug treatments combined with minimal or no counseling support after 6 months (RR, 1.83; 95% CI, 1.68–1.98).[5,10]
- External Validity: Good.

### References

IARC Working Group on the Evaluation of Carcinogenic Risks to Humans: Tobacco smoke and involuntary smoking. IARC Monogr Eval Carcinog Risks Hum 83: 1-1438, 2004.15285078
U.S. Department of Health and Human Services: The Health Consequences of Smoking—50 Years of Progress: A Report of the Surgeon General. U.S. Department of Health and Human Services, CDC, National Center for Chronic Disease Prevention and Health Promotion, Office on Smoking and Health, 2014. Also available online (https://www.ncbi.nlm.nih.gov/books/NBK179276/). Last accessed December 30, 2024.
U.S. Department of Health and Human Services: Smoking Cessation: A Report of the Surgeon General. U.S. Department of Health and Human Services, Centers for Disease Control and Prevention, National Center for Chronic Disease Prevention and Health Promotion, Office on Smoking and Health, 2020. Also available online (https://www.hhs.gov/sites/default/files/2020-cessation-sgr-full-report.pdf). Last accessed February 20, 2025.
Stead LF, Buitrago D, Preciado N, et al.: Physician advice for smoking cessation. Cochrane Database Syst Rev 2013 (5): CD000165, 2013.23728631
Rice VH, Heath L, Livingstone-Banks J, et al.: Nursing interventions for smoking cessation. Cochrane Database Syst Rev 12 (12): CD001188, 2017.29243221
Hartmann-Boyce J, Livingstone-Banks J, Ordóñez-Mena JM, et al.: Behavioural interventions for smoking cessation: an overview and network meta-analysis. Cochrane Database Syst Rev 1: CD013229, 2021.33411338
Hartmann-Boyce J, Chepkin SC, Ye W, et al.: Nicotine replacement therapy versus control for smoking cessation. Cochrane Database Syst Rev 5 (5): CD000146, 2018.29852054
Hajizadeh A, Howes S, Theodoulou A, et al.: Antidepressants for smoking cessation. Cochrane Database Syst Rev 5 (5): CD000031, 2023.37230961
Livingstone-Banks J, Fanshawe TR, Thomas KH, et al.: Nicotine receptor partial agonists for smoking cessation. Cochrane Database Syst Rev 5 (5): CD006103, 2023.37142273
Stead LF, Koilpillai P, Fanshawe TR, et al.: Combined pharmacotherapy and behavioural interventions for smoking cessation. Cochrane Database Syst Rev 3 (3): CD008286, 2016.27009521

## Evidence of Benefit

### Background

In the United States, smoking-related illnesses accounted for an estimated 480,000 deaths each year.[1,2] On average, these deaths occur 12 years earlier than would be expected, so the aggregate annual loss exceeds 5 million life-years.[3] These deaths are primarily due to smoking’s role as a major cause of cancer, cardiovascular disease, and chronic lung disease. The known adverse health effects also include other respiratory diseases and symptoms, nuclear cataract, hip fractures, reduced female fertility, diabetes, erectile dysfunction, rheumatoid arthritis, and diminished health status. Maternal smoking during pregnancy is associated with fetal growth restriction, low birth weight, and complications of pregnancy.[2] About 50% of cancer deaths in the United States are attributable to modifiable behavioral risk factors, one of which is smoking.[4]

Tobacco products are the leading avoidable cause of cancer, causing more than 155,000 deaths among smokers in the United States annually due to various cancers.[5] Most cancers of the lung, trachea, bronchus, larynx, pharynx, oral cavity, nasal cavity, and esophagus are attributable to tobacco products, particularly cigarettes. Smoking is also causally associated with cancers of the pancreas, kidney, bladder, stomach, colon, rectum, liver, and cervix, and with myeloid leukemia.[2,6]

Smoking also has substantial effects on the health of nonsmokers. Environmental or secondhand tobacco smoke is implicated in causing lung cancer, coronary heart disease, stroke, nasal irritation, and reproductive effects in women (low birth weight in newborns of these women).[2] Among children, secondhand smoke exposure is causally associated with sudden infant death syndrome, lower respiratory tract illnesses, otitis media, middle ear effusion, exacerbated asthma, and respiratory effects such as cough, wheeze, and dyspnea.[2]

Environmental tobacco smoke has the same components as inhaled mainstream smoke, although in lower absolute concentrations, between 1% and 10%, depending on the constituent. Carcinogenic compounds in tobacco smoke include the polycyclic aromatic hydrocarbons (PAHs), including the carcinogen benzo[a]pyrene (BaP) and the nicotine-derived tobacco-specific nitrosamine, 4-(methylnitrosamino)-1-(3-pyridyl)-1-butanone (NNK).[7] Elevated biomarkers of tobacco exposure, including urinary cotinine, tobacco-related carcinogen metabolites, and carcinogen-protein adducts, are seen in passive or secondhand smokers.[8-11]

In 2021, 13.1% of adult men and 10.1% of adult women in the United States were current smokers, and 24.1% of adult men and 13.6% of adult women reported the use of any tobacco product.[12] Cigarette smoking is particularly common among American Indian and Alaska Native individuals. The prevalence of smoking also varies inversely with education, and was highest among adults who had earned a General Educational Development diploma (30.1%) and generally decreased with increasing years of education.[12] From 2011 to 2014, significant declines occurred in the use of cigarettes among middle school (4.3% to 2.5%) and high school (15.8% to 9.2%) students.[13] Cigarette smoking prevalence among male and female high school students increased substantially during the 1990s in all ethnic groups, with rates between 20% and 30%. However, by 2023, the cigarette smoking rate in high school students declined to 2%.[4,14,15] (Also available online. (https://monitoringthefuture.org/wp-content/uploads/2022/08/vol1_2001.pdf))

The effect of tobacco use on population-level health outcomes is illustrated by the example of lung cancer mortality trends. Smoking by women increased between 1940 and the early 1960s, resulting in a greater than 600% increase in female lung cancer mortality since 1950. Lung cancer is now the leading cause of cancer death in women.[14,16] In the last 30 years, prevalence of current cigarette use has generally decreased, though far more rapidly in men. Lung cancer mortality in men peaked in the 1980s, and has been declining since then; this decrease has occurred predominantly in squamous cell and small cell carcinomas, the histological types most strongly associated with smoking.[14] Variations in lung cancer mortality rates by state also more or less parallel long-standing state-specific differences in tobacco use. Among men, the average annual age-adjusted lung cancer death rates from 2018 to 2022 were highest in Mississippi (63.1 per 100,000),[4] where 22% of men in Mississippi were current smokers in 2021, and lowest in Utah (18.0 per 100,000), where only 8% of men smoked. Among women, lung cancer death rates were highest in Kentucky (43.2 per 100,000), where 21% of women were current smokers, and lowest in Utah (13.5 per 100,000), where only 6% of women smoked.[4,14,17,18]

### Tobacco Use Interventions

Many health risks related to tobacco smoking can be reduced by smoking cessation. People who quit smoking before age 50 years have up to half the risk of dying within 15 years compared with people who continue to smoke. In addition, the risk of dying is reduced substantially even among people who stop smoking after age 70 years.[19] After 10 years of abstinence from smoking, the risk of lung cancer is 30% to 50% lower than that of continuing smokers, and the risk of oral and esophageal cancer is halved within 5 years of cessation.[19] People who quit smoking also lower their risk of acute myeloid leukemia and cancers of the cervix, stomach, larynx, pancreas, colon and rectum, liver, kidney, and bladder.[16,19-21]

In a randomized trial of heavy smokers, the long-term follow-up results demonstrated that compared with the nonintervention group (n = 1,964), those randomly assigned to a smoking cessation intervention (n = 3,923) experienced a 15% reduction in all-cause mortality rates (8.83 vs. 10.38 per 1,000 person-years; P = .03).[22] The smoking cessation intervention consisted of a strong physician message plus 12 group sessions and nicotine gum administered during a 10-week period. Decreases in the risk of lung cancer and other cancers, coronary heart disease, cardiovascular disease, and respiratory disease contributed to the benefit in the patients randomly assigned to the smoking cessation intervention.

The most recent Surgeon General's Report on the benefits of smoking cessation also outlined the accumulated evidence about health benefits associated with tobacco cessation for chronic cardiovascular diseases, respiratory diseases, and reproductive outcomes. Smoking cessation reduces the risk of morbidity and mortality from cardiovascular disease and stroke, reduces the risk of an abdominal aortic aneurysm and coronary heart disease, reduces the levels of inflammatory and hypercoagulability markers, leads to a reduction in the development of atherosclerosis, and reduces the burden of cardiovascular disease. Smoking cessation also reduces the risk of developing chronic obstructive pulmonary disease (COPD) and is the only recognized intervention to attenuate the loss of lung function among people with COPD. Smoking cessation benefits the health of pregnant women and their child. Benefits include a reduced risk of birthing a small-for-gestational-age infant and a reduced effect of smoking on fetal growth.[21]

Several approaches at the policy, legislative, and regulatory levels have been attempted to effect widespread reduction in or prevention of commencement of tobacco use. Various efforts at the community, state, and national level have been credited with reducing the prevalence of smoking over time. These efforts include reducing minors’ access to tobacco products, disseminating effective school-based prevention curricula together with media strategies, raising the cost of tobacco products, using tobacco excise taxes to fund community-level interventions such as mass media, providing proven quitting strategies through health care organizations, and adopting smoke-free laws and policies.[23,24]

As discussed in more detail below, clinical interventions targeted at individuals have shown promising results. A meta-analysis of randomized controlled trials (RCTs) showed that 6-month cessation rates were significantly improved with the use of nicotine replacement therapy (NRT) products compared with placebo or no intervention (relative risk [RR], 1.55; 95% confidence interval [CI], 1.49–1.61).[25] The benefits of using NRT products have been consistently observed regardless of whether the product used was the patch, gum, nasal spray, inhaler, or lozenge.[25] Smoking cessation counseling alone is also effective.[26] Even a brief intervention by a health care professional significantly increases the smoking cessation rate.[27]

#### Tobacco cessation guidelines

In 1996, the Agency for Health Care Policy and Research (AHCPR), now the Agency for Healthcare Research and Quality, released a landmark set of clinical smoking-cessation guidelines for helping nicotine-dependent patients and health care providers. Now sponsored by the U.S. Public Health Service, the updated 2008 guidelines, "Treating Tobacco Use and Dependence (https://www.ahrq.gov/professionals/clinicians-providers/guidelines-recommendations/tobacco/index.html)" are available online.[28] The broad elements of these guidelines are:

1. Clinicians should document the tobacco-use status of every patient.
2. Clinicians should assess the readiness to quit of patients who use tobacco and assist those who wish to quit in setting a quit date.
3. Patients using tobacco should be provided with at least one of the effective brief cessation interventions that are available.
4. In general, more intense interventions are more effective than less intense interventions in producing long-term tobacco abstinence, reflecting the dose-response relationship between the intervention and its outcome.
5. One or more of the three treatment elements identified as being particularly effective should be included in smoking-cessation treatment:
  a. Social support from clinicians in the form of encouragement and assistance.
  b. Skills training/problem solving (cessation/abstinence techniques).
  c. Pharmacotherapy, such as NRT products (e.g., patches, gum).
6. To be effective, health care systems must make institutional changes resulting in systematic identification of tobacco users and intervention with these patients at every visit.

For individual interventions, these guidelines [28] suggested a model based on outcomes from six major clinical trials of physician-delivered smoking intervention conducted in the late 1980s:[29] the ASK, ADVISE, ASSESS, ASSIST, and ARRANGE model. The physician provides a brief intervention that entails asking about smoking status at every visit, advising abstinence, assisting by setting a quit date, providing self-help materials and recommending use of NRT, and arranging for a follow-up visit. See below for brief intervention outlines. The recommendations also strongly supported the value of referral to more intensive counseling.

Ask, Advise, Assess, Assist, Arrange: Key Elements
A. Ask
  - Screen for smoking status at every visit or admission.
B. Advise
  - Minimal Advice: “As your physician, I must advise you that smoking is bad for your health, and it would be important for you to stop.”
  - Augmented Advice: “Because of your (__________) condition, it is particularly important for you to stop. If you stop now, (briefly educate patient about basic health benefits from quitting).”
C. Assess
  - Minimal Assessment: Ask every tobacco user if he/she is willing to make a quit attempt at this time.
  - Augmented Assessment: Assess characteristics of smoking history and patterns.
    - Amount smoked.
    - Quit history.
D. Assist/Counsel
  - Minimal Assistance: Provide self-help materials; assess interest in quitting; and assess interest in and appropriateness of pharmacological aids.
  - Augmented Assistance: Provide brief 5- to 7-minute patient-centered counseling.
E. Arrange Follow-Up Support
  - Minimal Follow-Up Support: Arrange for single follow-up contact by visit or by telephone in about 2 weeks; provide referral to a smoking counselor or group.
  - Extended Follow-Up Support: Establish “quit smoking” contract with quit date. Arrange three or more follow-up contacts by visit or by telephone.

In 2021, the U.S. Preventive Services Task Force (USPSTF) published an updated recommendation statement based on a systematic review that included 67 reviews addressing behavioral and pharmacological interventions for smoking cessation among the general population of adults that are largely in line with previous guidelines. In addition to asking all patients about tobacco use and advising them to abstain, the USPSTF recommended that clinicians provide evidence-based behavioral interventions and one or more of the seven pharmacotherapies approved by the U.S. Food and Drug Administration (FDA) for adults who use tobacco.[30]

The USPSTF recommendation was based on robust evidence that a variety of behavioral interventions (such as brief advice or support, counseling in various modalities, internet-based interventions, and financial incentives); all forms of NRT, bupropion hydrochloride (HCI), and varenicline; and the combination of behavioral and pharmacological interventions were significantly associated with increased abstinence rates of more than 6 months when compared with usual care or a minimal intervention. The USPSTF concluded with high certainty (the evidence was assigned an A grade) that the net benefit of evidence-based behavioral interventions and FDA-approved pharmacotherapy for tobacco cessation, alone or combined, is significant in adults who smoke.[31] Of note, the guidelines for pregnant women are similar, in that they recommend that clinicians ask all patients about tobacco use, advise them to abstain, and provide evidence-based behavioral interventions. However, the guidelines indicated that the evidence is insufficient to assess the benefits and harms of pharmacotherapy. The 2020 Surgeon General’s Report on smoking cessation, based on an independent evidence review, similarly concluded that evidence-based behavioral and pharmacological interventions for smoking cessation are safe and effective treatments.[21] The World Health Organization, the American College of Cardiology, the American Thoracic Society, and other similar organizations have issued guidance that is consistent with the USPSTF’s recommendations.[32-34]

Promoting smoking cessation among cancer patients and survivors is also essential because the deleterious health effects of cigarette smoking may impact prognosis in both the short term and long term. In an RCT of a peer-delivered smoking cessation intervention among childhood cancer survivors, a significantly higher 12-month quit rate was observed in the intervention group (15% vs. 9%; P < .01).[35] Continued smoking after a cancer diagnosis increases all-cause and cancer-specific mortality. Continued smoking is also associated with a higher risk of a recurrence or a second primary cancer, a poorer response to treatment, and increased treatment-related side effects.[2] Consistent with the tobacco cessation guidelines noted previously in the general adult population, the National Comprehensive Cancer Network Clinical Practice Guidelines for Smoking Cessation recommend that all cancer patients be assessed for tobacco use at regular intervals. They also recommend that patient treatment plans include evidence-based behavioral/motivational counseling, pharmacotherapy, and follow-up (with additional treatment if needed).[36]

### Behavioral Interventions to Assist in Tobacco Cessation

A wide array of behavioral interventions for smoking cessation that vary in content, mode of delivery, intensity, and duration have demonstrated various degrees of efficacy. Behavioral interventions may include advice to quit, cognitive, behavioral, and motivational counseling, internet or mobile applications, self-help materials, and financial incentives.[26,31]

The following sections summarize the evidence for the effect of these interventions on abstinence rates.

#### Physician or nurse advice and smoking cessation

The importance of health care providers in the identification of individuals who use tobacco and the provision of advice to quit has been consistently highlighted in evidence-based smoking cessation guidelines.[30] In an analysis pooling data from 17 trials, brief physician advice versus no advice (or usual care) was associated with a significant increase in abstinence rates at 6 months (RR, 1.66; 95% CI, 1.42–1.94). Although there was no statistical difference in abstinence rates between minimal advice and more intensive subgroups, the estimated effect was higher for the more intensive interventions (RR, 1.84; 95% CI, 1.60–2.13).[27] Similarly, a separate review reported moderate-quality evidence suggesting that compared with usual care, behavioral support/advice delivered by nurses resulted in increased abstinence rates (RR, 1.29; 95% CI, 1.21–1.38).[37] The analysis found no evidence that high-intensity interventions or interventions with additional follow-up increased abstinence rates. Even though the absolute effects of brief advice from a physician or nurse may be smaller than other interventions for smoking cessation, the impact on public health can still be substantial if a large volume of these clinicians offer advice to quit to people who use tobacco.

#### Financial incentive programs for smoking cessation

Financial incentive programs can offer additional support for smoking cessation efforts and may involve incentives for program engagement, compliance with program processes or milestones, and/or tobacco or smoking abstinence outcomes. Results from a randomized trial suggest that the efficacy of such programs may be influenced greatly by the way rewards are disbursed.[38,39]

The trial randomly assigned 2,538 participants to either one of four incentive programs or usual care. The four programs were combinations of scope (two programs targeted individuals, and two targeted groups of six participants) and incentive structure (one of the individual-focused programs and one of the group-focused programs provided rewards of approximately $800 to participants who achieved cessation at 6 months; the others required an initial refundable deposit of $150, supplemented with $650 in reward payments for successful cessation). The rationale for the four intervention arms was based on behavioral observations that 1) people are more loss averse than gain seeking and 2) collaboration/competition with others can bolster intervention efficacy.[38]

Two main dimensions of the intervention effects were explored:

1. Acceptance of the intervention.
2. Efficacy of the intervention.

Both intent-to-treat and per-protocol analyses were performed, with an in-depth sensitivity analysis for potential biases accompanying the latter. In the intent-to-treat analyses (which evaluated the overall efficacy of the interventions), all of the financial incentive arms demonstrated significantly higher 6-month abstinence rates than the usual care arm (9.4%–16%, compared with 6% for usual care). The 6-month abstinence rates were similar between the group-focused and individual-focused arms (13.7% and 12.1%, respectively; P = .29), but the reward-based programs were associated with higher abstinence rates than were the deposit-based ones (15.7% vs. 10.2%; P < .001).[38]

However, per-protocol analyses that accounted for the dramatically lower acceptance rate for the deposit-based interventions than for the reward-based interventions (14% vs. 90%) estimated that 6-month abstinence rates could be 13.2 percentage points (95% CI, 3.1–22.8) higher in the deposit-based programs than in the reward-based programs among the estimated 13.7% of participants who would participate in either type of program. That is, deposit-based interventions may be more efficacious than reward-based interventions, but it is harder to get people to commit to them.[38]

A systematic review of 33 trials included more than 21,000 participants. The pooled RR for quitting with incentives at 6 months was 1.49 (95% CI, 1.28–1.73; 31 RCTs; adjusted N = 20,097; I^2^ = 33%), compared with controls, indicating that there is high certainty evidence that the use of incentives improves abstinence rates.[40] After excluding six studies that offered incentives at the 6-month follow-up time point, the results remained consistent (RR, 1.40; 95% CI, 1.16–1.69; 25 RCTs; adjusted N = 17,058; I^2^ = 36%), suggesting that the effect of those incentives persisted after the incentives ended. The authors noted that the financial value of the incentives varied across studies (including some that involved redeemable self-deposits), but there were no clear effects related to incentive value. They also examined the effect of incentives on smoking cessation in people who were pregnant and reported moderate-quality evidence (limited by the risk of bias) that incentive programs initiated at the end of pregnancy or postpartum led to increased abstinence rates at 24 weeks postpartum (RR, 2.38; 95% CI, 1.54–3.69; N = 2,273; I^2^ = 41%).

A subsequent component network meta-analysis assessed the effect of behavioral interventions on abstinence across 33 systematic reviews, which included 312 RCTs and more than 250,000 participants. Results indicated that the only interventions that demonstrated benefit were the provision of financial incentives and the provision of counseling.[26]

### Pharmacological Interventions to Assist in Tobacco Cessation

Pharmacological agents have been used successfully to aid in the cessation of smoking in the general population.[41] Since the original AHCPR guidelines [42] were published in 1996, various nicotine replacement products have been approved for over-the-counter sale, and additional evidence of the effectiveness of therapies for smoking cessation has been published.[43-46] Pharmacotherapy of smoking cessation, including NRTs (gum, patch, spray, lozenge, and inhaler) and non-nicotine medications (e.g., bupropion HCI and varenicline), results in statistically significant increases in smoking cessation rates over those of a placebo.[47]

A growing number of smoking cessation pharmacotherapies have demonstrated efficacy in significantly increasing rates of smoking cessation. The choice of therapy should be individualized based on several factors, including past experience, patient and/or physician preference, and potential agent side effects. As more is learned about specific genetic variants that influence a smoker's response to smoking cessation pharmacotherapies—such as polymorphisms in genes encoding enzymes involved in nicotine metabolism—this information could eventually be integrated into smoking cessation treatment planning.[48] Presently, the evidence is not yet sufficient to be integrated into clinical practice.

The following sections summarize available pharmacological interventions to assist in tobacco cessation. More comprehensive information is available from product package inserts.

#### Nicotine replacement therapy (NRT)

NRT products, including nicotine patches, gums, lozenges, inhalers, and nasal sprays, are designed to relieve nicotine withdrawal symptoms. There are several precautions before initiating therapy, but these precautions do not constitute absolute contraindications. Special considerations are necessary in some patient groups (e.g., those with medical conditions such as arrhythmias, uncontrolled hypertension, esophagitis, peptic ulcer disease, insulin-treated diabetes, or asthma; pregnant or breast-feeding women; and adolescent smokers).[49] Commonly reported side effects differ by product type. These side effects include erythema, pruritus, local irritation, stomatitis, sore throat, jaw soreness, gastrointestinal complaints (including nausea and vomiting), heart palpitations, insomnia, hiccups, and coughing.[50]

Based on a synthesis of the results of 133 randomized trials, researchers found that NRTs, alone or in combination, improved cessation rates over placebos after 6 months (RR, 1.55; 95% CI, 1.49–1.61). In addition, similar benefits of NRT product use were observed regardless of the product type (patch, gum, nasal spray, inhaler, or lozenge).[25] When compared directly, the use of a single fast-acting NRT (such as nicotine lozenges or gum) or the nicotine patch results in similar 6-month cessation rates (RR, 0.90; 95% CI, 0.77–1.05).[51] The results of an analysis that included 16 randomized trials concluded that combining a fast-acting NRT with the nicotine patch resulted in higher 6-month cessation rates compared with the nicotine patch alone (RR, 1.27; 95% CI, 1.17–1.37).[51] However, not all trials supported this conclusion.[52]

Current guidelines generally recommend 8 to 12 weeks of transdermal nicotine therapy, starting on the quit day. Findings from two randomized placebo-controlled trials of transdermal therapy differed in their findings as to whether extended therapy (22–24 weeks vs. 8 weeks) improves quit rates.[53,54]

#### Non-nicotine products

##### Bupropion hydrochloride (HCI)

Also used as an antidepressant, bupropion HCl is a non-nicotine aid to smoking cessation. It is a relatively weak inhibitor of the neuronal uptake of norepinephrine, serotonin, and dopamine, and does not inhibit monoamine oxidase. The exact mechanism by which bupropion HCl enhances the ability of patients to abstain from smoking is unknown. However, it is presumed that this action is mediated by noradrenergic or dopaminergic mechanisms. Based on the results of 50 randomized trials that compared bupropion HCI with placebo, after 6 months of follow-up, bupropion was associated with a statistically significant increase in the likelihood of quitting smoking (RR, 1.60; 95% CI, 1.49–1.72).[55] There was insufficient evidence to support the idea that combining bupropion HCI with NRT increases smoking cessation rates over those of NRT alone (RR, 1.17; 95% CI, 0.95–1.44). However, results (based on three trials) indicated that the combination of bupropion HCI and varenicline may result in higher 6-month cessation rates compared with varenicline alone (RR, 1.21; 95% CI, 0.95–1.55). Although there was no difference in the efficacy of bupropion HCI compared with single-form NRT (RR, 1.03; 95% CI, 0.93–1.13), there was evidence that the use of bupropion HCI resulted in lower cessation rates than varenicline (RR, 0.73; 95% CI, 0.67–0.80) and combination NRT (RR, 0.74; 95% CI, 0.55–0.98), and higher cessation rates than the antidepressant, nortriptyline (RR, 1.30; 95% CI, 0.93–1.82).[55] Commonly reported side effects of bupropion HCI include insomnia, dry mouth, dizziness, and rhinitis. A higher incidence of seizures was also reported in patients being treated for bulimia/anorexia.

##### Varenicline

Varenicline is a selective partial agonist at the alpha-4-beta-2 nicotinic acetylcholine receptor, which mediates nicotine dependence through dopamine release. Varenicline prevents nicotine from binding to the receptor and reduces both the rewarding effects of smoking and withdrawal symptoms. The most commonly reported side effects of varenicline include nausea, abnormal dreams, and insomnia. In two of the initial RCTs for smoking cessation, varenicline was titrated to a dose of 1 mg twice a day and compared with bupropion HCI sustained-release (SR) 150 mg twice a day and a placebo group.[56,57] Treatment lasted for 12 weeks, with an additional 40 weeks of posttreatment follow-up. In both studies, varenicline was more efficacious than bupropion HCI and placebo for continuous abstinence from smoking at 9 to 12 weeks and at 9 to 24 weeks of follow-up. For 9 to 52 weeks of follow-up, varenicline was more efficacious than placebo in both studies.[56,57] At 52 weeks of follow-up, the 7-day point prevalence of smoking abstinence was 46% higher in the varenicline group than in the bupropion HCI SR group (odds ratio [OR], 1.46; 95% CI, 1.04–2.06).[56] The other study also showed a 46% higher continuous abstinence in the varenicline group (OR, 1.46; 95% CI, 0.99–2.17).[57] Approximately 30% of the participants who were randomly assigned to receive varenicline reported nausea, more than double the rate in the bupropion HCI groups, and triple the rate seen in the placebo groups.

In a randomized trial comparing varenicline with transdermal nicotine, continuous abstinence was greater in the varenicline group than in the transdermal nicotine group at the end of treatment (56% vs. 43%; P < .001) and during posttreatment follow-up (26% vs. 20%; P = .06).[58] The prevalence of nausea in the varenicline group (37%) was more than triple that in the transdermal nicotine group (10%). However, this result was not confirmed in a subsequent randomized trial that compared varenicline with the nicotine patch.[52] There was little difference in 7-day point-prevalence abstinence after 26 weeks (24% vs. 23%; P = .82) or 52 weeks (19% vs. 21%; P = .61) between those randomly assigned to the varenicline intervention and those assigned to the nicotine-patch intervention.

The results of a synthesis of 41 randomized trials indicated that varenicline results in increased 6-month cessation rates when compared with placebo (RR, 2.32; 95% CI, 2.15–2.51), bupropion HCI (RR, 1.36; 95% CI, 1.25–1.49), and single-form NRT (RR, 1.25; 95% CI, 1.14–1.37), but provided no clear evidence that varenicline was superior to dual NRT (RR, 1.02; 95% CI, 0.87–1.20 ).[59]

After a period of postmarketing surveillance, on July 1, 2009, the FDA required additions to the Boxed Warnings for both bupropion HCI and varenicline to describe the risk of serious neuropsychiatric symptoms associated with these products. Symptoms include: “changes in behavior, hostility, agitation, depressed mood, suicidal thoughts and behavior, and attempted suicide.”[60] The FDA further advised that the important health benefits of quitting smoking “should be weighed against the small, but real, risk of serious adverse events with the use of varenicline or bupropion.”[60] Subsequently, the FDA required the manufacturers of bupropion HCI and varenicline to conduct a clinical trial to evaluate the neuropsychiatric safety of these medications in patients with and without a history of psychiatric disorders (EAGLES trial). This randomized, double-blind, triple-dummy, placebo-controlled and active-controlled (nicotine patch) trial of varenicline and bupropion HCI included over 8,000 cigarette smokers (one-half of which had current or a history of psychiatric disorders) from 140 sites in 16 countries. In the nonpsychiatric cohort, the varenicline-placebo and bupropion-placebo risk differences (RDs) for moderate and severe neuropsychiatric adverse events were -1.28 (95% CI, -2.40 to -0.15) and -0.08 (95% CI, -1.37 to 1.21), respectively. In the psychiatric cohort, the varenicline-placebo and bupropion-placebo RDs were 1.59 (95% CI, -0.42 to 3.59) and 1.78 (95% CI, -0.24 to 3.81), respectively. The most frequent adverse events by treatment group were nausea (varenicline, 25%), insomnia (bupropion HCI, 12%), abnormal dreams (nicotine patch, 12%), and headache (placebo, 10%). The results of the trial did not show a significant increase in rates of moderate-to-severe neuropsychiatric adverse events with either varenicline or bupropion HCI in those with or without psychiatric disorders [61] and were supported by other studies analyzing data from multiple cessation trials.[62-64] These results prompted the FDA to remove the Boxed Warnings for both bupropion HCI and varenicline in 2016, noting that although the risk of mental health side effects is still present, particularly for individuals with some mental illnesses, the “results of the trial confirm that the benefits of stopping smoking outweigh the risks of these medicines.”[65]

A meta-analysis of double-blind, placebo-controlled, randomized trials of varenicline administered for at least 1 week (N = 14 trials) indicated that varenicline was associated with an increased risk of serious adverse cardiovascular events (RR, 1.72; 95% CI, 1.09–2.71).[66] This finding is particularly noteworthy because almost all of the randomized trials included in the meta-analysis had the following in common: they excluded patients with cardiovascular disease (CVD) at baseline; the usual average age of the patient populations (early 40s) was young for CVD; varenicline was usually given for 12 weeks or less; and varenicline is efficacious for smoking cessation, which would act to decrease CVD risk. A subsequent extension study to the EAGLES trial,[61] described above, evaluated the time to development of major adverse cardiovascular events (MACE: cardiovascular death, nonfatal myocardial infarction, or nonfatal stroke) across treatment groups (placebo, NRT, bupropion HCI, and varenicline) as a primary outcome. The extension study reported no significant difference in time to onset of MACE for varenicline or bupropion HCI, compared with placebo (varenicline: hazard ratio [HR], 0.29; 95% CI, 0.05–1.68 and bupropion HCI: HR, 0.50; 95% CI, 0.10–2.50) and no significant differences in the incidence of cardiovascular events during treatment by treatment group.[67] An analysis of 18 studies reported that while more people taking varenicline experienced cardiac serious adverse events compared with placebo or no medication (RR, 1.20; 95% CI, 0.79–1.8), conclusions about harm are limited because of imprecision in the estimates.[59]

##### Fluoxetine

Although Zyban (bupropion HCl) is the only antidepressant approved by the FDA for smoking cessation, Prozac (fluoxetine HCl) has been shown to be effective in some studies.[68] Pooled results from two RCTs indicated no significant difference in cessation rates after 6 months between selective serotonin reuptake inhibitor users (including fluoxetine HCI) and the control arms in two studies (RR, 0.93; 95% CI, 0.71–1.22). There was also no significant increase in cessation rates when fluoxetine HCI was added to NRT in three studies (RR, 0.70; 95% CI, 0.64–1.82).[69] The most commonly reported side effects of fluoxetine HCI include insomnia, dizziness, anorexia, sexual dysfunction, and confusion.

##### Cytisine

Cytisine is a naturally occurring compound isolated more than 50 years ago from the plant Cytisus laburnum, a partial nicotinic acetylcholine receptor agonist.[70] It has a long history of use for smoking cessation in Bulgaria and other eastern European nations, including clinical trials published in the 1970s. As this older evidence has been uncovered, it has led to more recent trials in western nations. A systematic review and meta-analysis showed clear benefit for cytisine compared with placebo.[70] For all trials combined (n = 9 trials; 2,141 cytisine participants, 1,879 placebo participants), the pooled RR for abstinence from smoking at the longest follow-up for cytisine was 1.59 (95% CI, 1.43–1.75), compared with placebo. When the analyses were limited to two high-quality trials published since 2008, the pooled RR for smoking abstinence was 3.29 (95% CI, 1.84–5.90).[70] There was no evidence of serious adverse events, but gastrointestinal symptoms were more common in the cytisine (12%) group than in the placebo (7%) group.[70]

A randomized trial in New Zealand compared cytisine (n = 655) with NRT (n = 655).[71] Compared with the NRT group, the cytisine group had higher continued abstinence at 1 month (40% vs. 31%; RD, 9%; 95% CI, 4%–15%), 2 months (31% vs. 22%; RD, 9%; 95% CI, 4%–14%), and 6 months (22% vs. 15%; RD, 7%; 95% CI, 2%–11%).[71] There were no differences between treatment groups, but nausea and vomiting (28 events vs. 2 events) and sleep disorders (28 events vs. 2 events) were more common in the cytisine group, compared with the NRT group.[71] This trial is noteworthy because of the following results:

1. It considerably strengthened an already substantial body of evidence indicating that cytisine is an efficacious smoking cessation pharmacotherapy.
2. It showed that cytisine is more efficacious than NRT products that are known to be effective.

Based on a synthesis of the results of four randomized trials (4,623 participants), researchers found that cytisine improved cessation rates over placebo after 6 months (RR, 1.30; 95% CI, 1.15–1.61), with no evidence of an increase in serious adverse events (RR, 1.04; 95% CI, 0.78–1.37). Pooled results from two studies indicated no significant difference in cessation rates after 6 months between cytisine and varenicline (RR, 1.00; 95% CI, 0.79–1.26).[59] In a subsequent randomized noninferiority trial, cytisine was associated with lower cessation rates (OR, 0.63; 95% CI, 0.39–0.98) and fewer total adverse events (incidence rate ratio, 0.59; 95% CI, 0.43–0.81) than varenicline.[72] The most commonly reported side effects of cytisine include nausea, vomiting, and sleep disturbance.

##### Other agents

Nortriptyline has been suggested as a possibly useful second-line pharmacotherapy but is not approved for smoking cessation by the FDA. Nortriptyline is an antidepressant that does not contain nicotine. A meta-analysis of five RCTs found that smokers who received nortriptyline were 2.4 times more likely (95% CI, 1.7–3.6) than smokers who received a placebo to remain abstinent from smoking after 6 months.[73] Pooled results from six studies indicated that nortriptyline improved cessation rates over placebo after 6 months (RR, 2.03; 95% CI, 1.48–2.78), including limited evidence that bupropion HCI improved cessation rates over nortriptyline (RR, 1.30; 95% CI, 0.93–1.82).[55]

Lobeline (Bantron) is classified as a category III agent by the FDA, safe but not proven effective. This product is not recommended for use in any smoking cessation program due to its lack of efficacy.[74]

### Pharmacotherapy Combinations and Adaptations

Strategies to enhance the effectiveness of pharmacotherapy for smoking cessation have been explored, including combining medications and adjusting dosages and/or treatment duration.[75] As noted previously, a recent meta-analysis concluded that combining a fast-acting NRT with the nicotine patch (i.e., combined NRT) resulted in higher 6-month cessation rates compared with the nicotine patch alone (RR, 1.27; 95% CI, 1.17–1.37). The analysis included moderate-certainty evidence (limited by imprecision) indicating that 21 mg patches are more effective than 14 mg patches (RR, 1.48; 95% CI, 1.06–2.08) but that 42 mg patches are just as effective as 21 mg (24-hour) patches (RR, 1.09; 95% CI, 0.93–1.29). A subset of studies tested the effect of preloading NRT before quit day versus starting NRT on the quit day. In that subset, there was moderate-certainty evidence, limited by risk of bias, of a positive effect of preloading NRT on abstinence (RR, 1.25; 95% CI, 1.08–1.44). There was no reliable evidence of an effect of duration of single or combined NRT use on abstinence.[51] In another meta-analysis, results (based on three trials) indicated that the combination of bupropion HCI and varenicline may result in higher 6-month cessation rates compared with varenicline alone (RR, 1.21; 95% CI, 0.95–1.55). However, there was insufficient evidence to suggest that combining bupropion HCI plus NRT increases smoking cessation rates over those of NRT alone (RR, 1.17; 95% CI, 0.95–1.44).[55]

A 2015 meta-analysis included randomized trials that compared the combination of varenicline and NRT therapy with varenicline alone. The analysis showed a statistically significant association with a smoking cessation benefit for the combination treatment, especially if a nicotine patch was given before treatment with varenicline.[76] In a subsequent double-blind, 2 × 2 factorial RCT, 1,251 individuals who smoked were randomly assigned to receive smoking cessation counseling and varenicline monotherapy for 12 weeks, varenicline plus NRT (patch) for 12 weeks, varenicline monotherapy for 24 weeks, or varenicline plus NRT for 24 weeks.[77] For the primary outcome of abstinence at 52 weeks, there was no significant interaction between medication type and medication duration (OR, 1.03; 95% CI, 0.91–1.17; P = .66). The abstinence rate was 24.8% for individuals randomly assigned to 24-week treatment duration versus 24.3% for those randomly assigned to 12-week treatment duration (risk difference, -0.4%; 95% CI, -5.2% to 4.3%; OR, 1.01; 95% CI, 0.89–1.15). The abstinence rate was 24.3% for individuals randomly assigned to varenicline-combination therapy versus 24.8% for those randomly assigned to varenicline monotherapy (risk difference, 0.4%; 95% CI, -4.3% to 5.2%; OR, 0.99; 95% CI, 0.87–1.12). Adverse effects across the four treatment groups included nausea (24.0%–30.9%) and insomnia (24.4%–30.5%). These findings do not support the addition of NRT to varenicline or the extension of varenicline or combination therapy beyond the standard 12 weeks.[77]

In a double-blind, placebo-controlled, sequential, multiple-assignment randomized trial (SMART), 490 individuals who smoked were randomly assigned to receive 6 weeks of varenicline (2 mg/d) or combined NRT (21 mg/d patch and 2 mg lozenges as needed) and smoking cessation counseling. After 6 weeks, abstainers continued their assigned medication and nonabstainers were randomly assigned again to continue the initially assigned medication at the initial dose, switch between varenicline and combined NRT at the initial dose, or increase the varenicline (3 mg/d) or combined NRT (42 mg/d patch) dose for an additional 6 weeks.[78]

At 12 weeks, the probability of abstinence for those initially randomly assigned to varenicline who were abstinent at 6 weeks and continued on treatment (not randomized again) was 72% (95% credible interval [Crl], 65%–78%) compared with 78% (95% Crl, 69%–85%) for those initially randomly assigned to combined NRT who were abstinent at 6 weeks and continued on treatment. The posterior probability of a nonzero difference between these two conditions was 88% (absolute risk difference [ARD], 6%; 95% CrI, -5% to 16%). The probability of abstinence at 12 weeks (end of treatment) for the individuals initially assigned to varenicline who were not abstinent at 6 weeks was 20% (95% CrI, 16%–26%) for those who increased their varenicline dosage, 0% for those who switched to combined NRT, and 3% (95% CrI, 1%–4%) for those who were assigned to the continued-varenicline treatment group (ARD, -3%; 95% CrI, -4% to -1%). There was a more than 99% posterior probability that continuing varenicline at the initial dosage was worse than switching to a higher dosage. Increasing the varenicline dosage had an ARD of 18% (95% CrI, 13%–24%) and a more than 99% posterior probability of conferring benefit. The probability of abstinence at 12 weeks for the individuals initially assigned to combined NRT who were not abstinent at 6 weeks was 8% (95% CrI, 6%–10%) for those who continued at the initial dosage, 14% (95% CrI, 10%–18%) for those who increased their dosage, and 14% (95% CrI, 10%–18%) for those who switched to varenicline (ARD, 6%; 95% CrI, 6%–11%). There was a more than 99% posterior probability that either strategy conferred benefit over continuing at the initial dosage. The secondary outcome of continuous abstinence at 6-months post-quit indicated that only increased dosages of varenicline and combined NRT provided benefit over continuation of the initial treatment dosages. Relative to continuing the same medication, there was no evidence indicating an increased risk of adverse events associated with the dosage increases for either medication. Additionally, no major differences in treatment adherence were reported between treatment groups.

In summary, these results suggest that individuals who are not able to abstain from smoking after initial treatment with varenicline benefit most from increasing the varenicline dose. For the individuals who continue to smoke after initial treatment with combined NRT, switching to varenicline or increasing the dose of combined NRT resulted in similar end-of-treatment abstinence probabilities. The secondary outcome of continuous abstinence at 6 months favored the dose-increase conditions for both varenicline and combined NRT, relative to continuation.[78]

On the other hand, in an RCT of 392 Black adults who smoked daily, switching from the nicotine patch to varenicline at 2 weeks or to bupropion HCI plus the nicotine patch at 6 weeks (adapted care) for individuals who did not quit smoking at those respective time points did not significantly improve abstinence rates, compared with standard treatment with the nicotine patch at 12 weeks (17.4% vs. 11.7%; OR, 1.58; 95% CI, 0.89–2.80; P = .12), 18 weeks (16.3% vs. 15.8%; OR, 1.04; 95% CI, 0.61–1.78; P = .89), or 26 weeks (12.2% vs. 13.3%; OR, 0.91; 95% CI, 0.50–1.65; P = .76).[79] The results also indicated that those who quit smoking within the first 2 weeks of treatment were significantly more likely to be abstinent at subsequent assessment points. However, the overall study abstinence rates were lower than those found in similar studies that included Black adults who were using the nicotine patch for smoking cessation.[80,81]

### Smoking Reduction

Among smokers who are interested in quitting but not ready to make an immediate quit attempt, gradually decreasing the number of cigarettes smoked per day leading up to a quit attempt may prove to be a viable intervention strategy. This reduce to quit approach was tested in the context of an RCT. In this study, both the intervention group and control group received counseling, with the goals of reducing the number of cigarettes smoked per day by 75% or greater by week 8 and to quit smoking entirely by week 12.[82] The intervention group (n = 760) also received smoking cessation pharmacotherapy (varenicline at a maintenance dose of 1 mg bid for 24 weeks), whereas the control group (n = 750) received placebo tablets. For the primary end point of self-reported smoking abstinence during weeks 15 through 24, a statistically significant RD of 25.2% (varenicline group, 32.1% vs. placebo group, 6.9%; 95% CI, 21.4%–29.0%) was observed. The clinical significance of this finding is that it provides evidence of benefit for a pharmacotherapy-enhanced intervention aimed to motivate smokers who are interested in quitting, but not yet ready to quit, to start by cutting down on the number of cigarettes per day as a lead-in to a subsequent quit attempt.

For a smoker who wants to quit, an important practical question is whether a quit attempt is more likely to successfully result in smoking cessation if it involves abruptly stopping smoking or gradually decreasing the number of cigarettes smoked per day leading up to a quit attempt. U.S. evidence-based guidelines recommend abrupt quitting as the preferred approach,[83] but guidelines from other countries vary on this matter. To directly test this question, 697 smokers who wanted to quit were recruited from 31 primary care clinics in England, and randomly assigned to either a gradual or abrupt smoking cessation intervention.[84] In this noninferiority trial, both groups were provided with access to NRT during the two weeks before the planned quit date. In the gradual cessation group, plans were made to cut down the number of cigarettes per day by 75% by the planned quit date. However, the abrupt cessation group was advised to follow usual smoking patterns until stopping smoking entirely on the planned quit date. Both groups were provided with NRT after the quit date and throughout the trial. For the primary end point of prolonged validated smoking abstinence at 4 weeks, the gradual cessation arm was less likely to quit smoking than the abrupt cessation arm (39.2% vs. 49.0%); the difference was statistically significant (RD, -9.8%; 95% CI, 2.5%–17.1%). The statistically significantly lower likelihood of smoking cessation in the gradual versus abrupt intervention arms persisted during follow-up at 8 weeks (29.2% vs. 36.6%; RD, -7.4%; 95% CI, 0.4%–14.3%) and 6 months (15.5% vs. 22.0%; RD, -6.5%; 95% CI, 0.7%–12.2%). Baseline patient preferences for a gradual or abrupt quit attempt indicated that smokers who preferred the gradual quitting approach had a lower likelihood of smoking abstinence at 4 weeks (38% vs. 52%), suggesting that patient preferences for these methods may be a marker for other factors associated with successful quitting, such as motivation to quit. However, even when stratified by baseline patient preferences, the gradual cessation method resulted in lower likelihood of cessation both among those who preferred the gradual approach (34.6% vs. 42.0%) and those who preferred the abrupt approach (45.8% vs. 58.1%). The overall clinical significance of this study is that it provides evidence that in the setting of a pharmacotherapy-aided quit attempt among smokers interested in quitting, quitting abruptly is a more effective smoking cessation strategy than gradually cutting down on the number of cigarettes smoked before making a quit attempt. This result holds true regardless of smoker preferences in methods. A quit attempt regardless of method should never be discouraged, but abrupt cessation appears to be the most effective strategy. In this context, abrupt cessation is distinct from making an unaided quit attempt (i.e., quitting “cold turkey”).[85]

A systematic review of this topic revealed substantial heterogeneity in the results across studies, but the results showed that gradual cessation was associated with a 6% lower likelihood of smoking cessation than abrupt cessation, although this finding was not statistically significant (RR, 0.94; 95% CI, 0.79–1.13).[85] In an updated review of 51 trials that included more than 22,000 participants, the authors concluded, with moderate-certainty evidence, that long-term (≥ 6 months) abstinence rates did not differ in participants who were randomly assigned to either a gradual cessation intervention or an abrupt quitting intervention (RR, 1.01; 95% CI, 0.87–1.17; I^2^ = 29%; 22 studies, 9,219 participants).[86] When comparing the effects of a gradual cessation intervention with no smoking cessation intervention on abstinence rates, the authors reported low-certainty evidence (limited by inconsistency, imprecision, and risk of bias) that was inconclusive (RR, 1.74; 95% CI, 0.90–3.38; I^2^ = 45%; 6 studies, 1,599 participants). The authors also reported low-certainty evidence that suggested gradual reduction methods may be more effective when combined with pharmacotherapy (RR, 1.68; 95% CI, 1.09–2.58; I^2^ = 78%; 11 studies, 8,636 participants). A subgroup analysis of these 11 studies reported the same conclusions, with moderate-certainty evidence, specifically when fast-acting NRTs or varenicline was used as pharmacotherapy (P < .001, I^2^ = 80% for subgroup differences).[86]

Among dependent smokers, complete abstinence from smoking is the ultimate goal. Even in instances when complete abstinence from smoking is not achieved, smoking cessation pharmacotherapies may benefit individual health—and ultimately the public’s health—if the smoker reduces the number of cigarettes smoked. The relationship between cigarette smoking and lung cancer, and other smoking-associated malignancies, is strongly dose-dependent. Thus, an individual smoker who is unable to achieve abstinence or who is not motivated to quit smoking may benefit by using pharmacotherapies (or other means) to reduce the number of cigarettes smoked per day. NRT has thus generated attention as a viable means of harm reduction. In studies that included smokers who were not trying to quit and were randomly assigned to receive either NRT or placebo, a greater proportion of those who received NRT reduced the number of cigarettes per day, compared with placebo.[87,88] However, the impact of NRT on smoking reduction appears not to be sustained in the long run.[89] Less evidence is available for bupropion HCI, varenicline, and psychosocial interventions as a means of harm reduction. A potential problem with such a harm reduction strategy would be if it prevented cessation among smokers who would have otherwise quit smoking. Evidence shows that smoking reduction is actually associated with increased likelihood of future cessation.[88,90] Another potential negative aspect of harm reduction would be if smokers reduced the number of cigarettes smoked per day but modified the way the cigarettes were smoked in such a way that exposure to tobacco toxins was not actually reduced (e.g., by inhaling more deeply). Compensatory behaviors such as inhaling more deeply or smoking more of a cigarette are attempts by the smoker to try to maintain nicotine levels, so the use of supplemental NRT presumably safeguards against this. Evidence from studies of smoking reduction with NRT that measured smoking biomarkers indicates that compensation occurs, but not to such an extent that it would be expected to outweigh the reduction in exposure from the reduced number of cigarettes per day.[87]

### School-Based Interventions

School-based interventions alone have not demonstrated a long-term impact on smoking prevention.[91] One of the highest-quality studies was a large randomized trial in which children received a theory-based program that incorporated various social-influence approaches from grade 3 through grade 12. There was no difference in smoking outcomes observed either at grade 12 or at 2 years after high school between school districts who received the intervention and those in the control arm.[92]

### Community Intervention Trial for Smoking Cessation (COMMIT)

The Community Intervention Trial for Smoking Cessation (COMMIT) was a National Cancer Institute–funded, large-scale study to assess a combination of community-based interventions designed to help smokers cease using tobacco. COMMIT involved 11 matched pairs of communities in North America, which were randomly assigned to an arm offering an active community-wide intervention or a control arm (no active intervention).[93] The 4-year intervention included messaging through existing media channels, major community organizations, and social institutions capable of influencing smoking behavior in large groups of people. The interventions were implemented in each community through a local community board that provided oversight and management of COMMIT activities.

In COMMIT, there was no difference in the mean quit rate of heavy smokers in the intervention communities (18.0%), compared with the control communities (18.7%). The difference in light-to-moderate smoker quit rates were statistically significant: averages of 30.6% for the intervention communities and 27.5% for the control communities (P = .004). Although no significant differences in quit rates between the sexes were observed, less-educated light-to-moderate smokers were more responsive to the intervention than were college-educated light-to-moderate smokers.[94,95]

### A Changing Marketplace for Tobacco Products and Nicotine-Delivery Devices

The expansion in the marketplace of tobacco products and devices that deliver nicotine poses new challenges to tobacco control.[96-100] Examples of nontraditional tobacco products in the U.S. market include small cigars, water pipe tobacco smoking (hookah), and new types of flavored, smokeless tobacco products modeled after Swedish snus. Prominent among non–tobacco-containing nicotine delivery devices are electronic cigarettes (or e-cigarettes) that have experienced a rapid upsurge in use and are now marketed by the major U.S. tobacco companies.[96,97] Monitoring this expansion in products, how the products are used (e.g., product switching, multiple use, and use for tobacco cigarette smoking cessation), and the harms and benefits associated with their use compared with the use of tobacco cigarettes is critical to the development of more effective tobacco control strategies.

Research to determine the potential risks and benefits of these new products is emerging, and initial findings are mixed.[101,102] The potential benefits of e-cigarettes as a smoking cessation aid for adult smokers is further complicated by two additional factors. First, there has been a marked increase in the use of e-cigarettes by adolescents, with current (past 30 days) e-cigarette use by high school seniors rising dramatically over the last 3 years, to 27.5% in 2019.[103] Second, the product has evolved rapidly, with newer electronic nicotine delivery systems, such as JUUL, more quickly and effectively delivering nicotine to the lungs and more closely mimicking cigarettes in terms of their pharmacokinetics.

In one study, 886 adults who attended the U.K. National Health Service stop-smoking services were randomly assigned to either starter packs of nicotine replacement medication or e-cigarettes. At 1 year, biochemically confirmed abstinence was 18.0% in the e-cigarette group compared with 9.9% in the nicotine-replacement group (P < .001). However, at 1 year, 80% of abstinent e-cigarette users were still using e-cigarettes, compared with 9% of abstinent nicotine-replacement medication users still using their products.[104] In contrast, a recent pragmatic trial randomly assigned smokers who were employed at 54 companies to access one of four interventions, which included usual care (information and motivational text messages), FDA-approved cessation medications, e-cigarettes, and financial incentives. The authors found that financial incentives added to free FDA-approved cessation medications resulted in higher quit rates than cessation medications alone. Among smokers who received usual care, the addition of free cessation medications or e-cigarettes did not provide an added benefit.[105]

Evidence suggests that cessation interventions delivered during children's pediatric visits to parents who smoked boost cessation rates.[83] A recent cluster randomized clinical trial [106] demonstrated higher quit rates 2 years after cessation interventions were delivered during pediatric visits, although there were a limited number of clusters (n = 10) included in the trial.

### References

Le TTT, Méndez D, Warner KE: New Estimates of Smoking-Attributable Mortality in the U.S. From 2020 Through 2035. Am J Prev Med 66 (5): 877-882, 2024.38143046
U.S. Department of Health and Human Services: The Health Consequences of Smoking—50 Years of Progress: A Report of the Surgeon General. U.S. Department of Health and Human Services, CDC, National Center for Chronic Disease Prevention and Health Promotion, Office on Smoking and Health, 2014. Also available online (https://www.ncbi.nlm.nih.gov/books/NBK179276/). Last accessed December 30, 2024.
Centers for Disease Control and Prevention (CDC): Smoking-attributable mortality, years of potential life lost, and productivity losses--United States, 2000-2004. MMWR Morb Mortal Wkly Rep 57 (45): 1226-8, 2008.19008791
American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Centers for Disease Control and Prevention: Targeting Tobacco Use: The Nation's Leading Cause of Death 2005. CDC, 2005.
Ontario Task Force on the Primary Prevention of Cancer: Recommendations for the Primary Prevention of Cancer. Queen's Printer for Ontario, 1995.
Cinciripini PM, Hecht SS, Henningfield JE, et al.: Tobacco addiction: implications for treatment and cancer prevention. J Natl Cancer Inst 89 (24): 1852-67, 1997.9414173 98074984
Finette BA, O'Neill JP, Vacek PM, et al.: Gene mutations with characteristic deletions in cord blood T lymphocytes associated with passive maternal exposure to tobacco smoke. Nat Med 4 (10): 1144-51, 1998.9771747 98442690
Benowitz NL: Cotinine as a biomarker of environmental tobacco smoke exposure. Epidemiol Rev 18 (2): 188-204, 1996.9021312 97173406
Hecht SS: Human urinary carcinogen metabolites: biomarkers for investigating tobacco and cancer. Carcinogenesis 23 (6): 907-22, 2002.12082012 22076994
U.S. Department of Health and Human Services: The Health Consequences of Involuntary Exposure to Tobacco Smoke: A Report of the Surgeon General. U.S. Department of Health and Human Services, Centers for Disease Control and Prevention, Coordinating Center for Health Promotion, National Center for Chronic Disease Prevention and Health Promotion, Office on Smoking and Health, 2006. Also available online (https://www.ncbi.nlm.nih.gov/books/NBK44324/). Last accessed February 20, 2025.
Cornelius ME, Loretan CG, Jamal A, et al.: Tobacco Product Use Among Adults - United States, 2021. MMWR Morb Mortal Wkly Rep 72 (18): 475-483, 2023.37141154
Youth and Tobacco Use. Atlanta, Ga: Centers for Disease Control and Prevention, 2015. Available online (https://www.cdc.gov/tobacco/php/data-statistics/youth-data-tobacco/?CDC_AAref_Val=https://www.cdc.gov/tobacco/data_statistics/fact_sheets/youth_data/tobacco_use/). Last accessed February 20, 2025.
Jemal A, Thun MJ, Ries LA, et al.: Annual report to the nation on the status of cancer, 1975-2005, featuring trends in lung cancer, tobacco use, and tobacco control. J Natl Cancer Inst 100 (23): 1672-94, 2008.19033571
Johnston LD, O'Malley PM, Bachman JG: Monitoring the Future: National Survey Results on Drug Use, 1975-2001. Volume I: Secondary School Students. National Institute on Drug Abuse, 2002. NIH Pub. No. 02-5106. Also available online (https://monitoringthefuture.org/wp-content/uploads/2022/08/vol1_2001.pdf). Last accessed February 20, 2025.
U.S. Preventive Services Task Force: Guide to Clinical Preventive Services: Report of the U.S. Preventive Services Task Force. 2nd ed. Williams & Wilkins, 1996.
American Cancer Society: Cancer Prevention & Early Detection Facts & Figures 2023-2024. American Cancer Society, 2024. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/cancer-prevention-and-early-detection-facts-and-figures/2024-cped-files/cped-2024-cff.pdf). Last accessed February 20, 2025.
Schoenborn CA, Adams PF, Peregoy JA: Health behaviors of adults: United States, 2008-2010. Vital Health Stat 10 (257): 1-184, 2013.25116426
U.S. Department of Health and Human Services: The Health Benefits of Smoking Cessation. A Report of the Surgeon General. U.S. Department of Health and Human Services, 1990. DHHS Publ No. (CDC) 90-8416.
The Health Consequences of Smoking: A Report of the Surgeon General. U.S. Department of Health and Human Services, CDC, National Center for Chronic Disease Prevention and Health Promotion, Office on Smoking and Health, 2004. Also available online (https://www.ncbi.nlm.nih.gov/books/NBK44695/). Last accessed April 9, 2025.
U.S. Department of Health and Human Services: Smoking Cessation: A Report of the Surgeon General. U.S. Department of Health and Human Services, Centers for Disease Control and Prevention, National Center for Chronic Disease Prevention and Health Promotion, Office on Smoking and Health, 2020. Also available online (https://www.hhs.gov/sites/default/files/2020-cessation-sgr-full-report.pdf). Last accessed February 20, 2025.
Anthonisen NR, Skeans MA, Wise RA, et al.: The effects of a smoking cessation intervention on 14.5-year mortality: a randomized clinical trial. Ann Intern Med 142 (4): 233-9, 2005.15710956
Wingo PA, Ries LA, Giovino GA, et al.: Annual report to the nation on the status of cancer, 1973-1996, with a special section on lung cancer and tobacco smoking. J Natl Cancer Inst 91 (8): 675-90, 1999.10218505 99232873
Koh HK: The end of the "tobacco and cancer" century. J Natl Cancer Inst 91 (8): 660-1, 1999.10218498 99232866
Hartmann-Boyce J, Chepkin SC, Ye W, et al.: Nicotine replacement therapy versus control for smoking cessation. Cochrane Database Syst Rev 5 (5): CD000146, 2018.29852054
Hartmann-Boyce J, Livingstone-Banks J, Ordóñez-Mena JM, et al.: Behavioural interventions for smoking cessation: an overview and network meta-analysis. Cochrane Database Syst Rev 1: CD013229, 2021.33411338
Stead LF, Buitrago D, Preciado N, et al.: Physician advice for smoking cessation. Cochrane Database Syst Rev 2013 (5): CD000165, 2013.23728631
Fiore MC, Jaén CR, Baker TB: Treating Tobacco Use and Dependence [Electronic Resource] : 2008 Update. Rockville, Md: Public Health Service, U.S. Department of Health and Human Services, 2008. Available online (https://www.ahrq.gov/sites/default/files/wysiwyg/professionals/clinicians-providers/guidelines-recommendations/tobacco/clinicians/update/treating_tobacco_use08.pdf). Last accessed February 20, 2025.
Glynn TJ, Manley MW, Pechacek TF: Physician-initiated smoking cessation program: the National Cancer Institute trials. Prog Clin Biol Res 339: 11-25, 1990.2118257 90363766
Krist AH, Davidson KW, Mangione CM, et al.: Interventions for Tobacco Smoking Cessation in Adults, Including Pregnant Persons: US Preventive Services Task Force Recommendation Statement. JAMA 325 (3): 265-279, 2021.33464343
Patnode CD, Henderson JT, Coppola EL, et al.: Interventions for Tobacco Cessation in Adults, Including Pregnant Persons: Updated Evidence Report and Systematic Review for the US Preventive Services Task Force. JAMA 325 (3): 280-298, 2021.33464342
World Health Organization: WHO Clinical Treatment Guideline for Tobacco Cessation in Adults. Geneva, Switzerland: World Health Organization, 2024. Available online (https://www.ncbi.nlm.nih.gov/books/NBK604670/pdf/Bookshelf_NBK604670.pdf). Last accessed February 7, 2025.
Barua RS, Rigotti NA, Benowitz NL, et al.: 2018 ACC Expert Consensus Decision Pathway on Tobacco Cessation Treatment: A Report of the American College of Cardiology Task Force on Clinical Expert Consensus Documents. J Am Coll Cardiol 72 (25): 3332-3365, 2018.30527452
Leone FT, Zhang Y, Evers-Casey S, et al.: Initiating Pharmacologic Treatment in Tobacco-Dependent Adults. An Official American Thoracic Society Clinical Practice Guideline. Am J Respir Crit Care Med 202 (2): e5-e31, 2020.32663106
Emmons KM, Puleo E, Park E, et al.: Peer-delivered smoking counseling for childhood cancer survivors increases rate of cessation: the partnership for health study. J Clin Oncol 23 (27): 6516-23, 2005.16116148
Shields PG, Bierut L, Arenberg D, et al.: Smoking Cessation, Version 3.2022, NCCN Clinical Practice Guidelines in Oncology. J Natl Compr Canc Netw 21 (3): 297-322, 2023.36898367
Rice VH, Heath L, Livingstone-Banks J, et al.: Nursing interventions for smoking cessation. Cochrane Database Syst Rev 12 (12): CD001188, 2017.29243221
Halpern SD, French B, Small DS, et al.: Randomized trial of four financial-incentive programs for smoking cessation. N Engl J Med 372 (22): 2108-17, 2015.25970009
Sunstein CR: Nudging smokers. N Engl J Med 372 (22): 2150-1, 2015.25970008
Notley C, Gentry S, Livingstone-Banks J, et al.: Incentives for smoking cessation. Cochrane Database Syst Rev 7 (7): CD004307, 2019.31313293
Okuyemi KS, Ahluwalia JS, Harris KJ: Pharmacotherapy of smoking cessation. Arch Fam Med 9 (3): 270-81, 2000.10728115 20192283
Fiore MC, Bailey WC, Cohen SJ, et al.: Smoking Cessation: Clinical Practice Guideline No 18. US Department of Health and Human Services, Public Health Service, Agency for Health Care Policy and Research, 1996. AHCPR Publ No 96-0692.
Tang JL, Law M, Wald N: How effective is nicotine replacement therapy in helping people to stop smoking? BMJ 308 (6920): 21-6, 1994.8179658 94129259
Hurt RD, Sachs DP, Glover ED, et al.: A comparison of sustained-release bupropion and placebo for smoking cessation. N Engl J Med 337 (17): 1195-202, 1997.9337378 97465738
Jorenby DE, Leischow SJ, Nides MA, et al.: A controlled trial of sustained-release bupropion, a nicotine patch, or both for smoking cessation. N Engl J Med 340 (9): 685-91, 1999.10053177 99150066
Hughes JR, Goldstein MG, Hurt RD, et al.: Recent advances in the pharmacotherapy of smoking. JAMA 281 (1): 72-6, 1999.9892454 99107472
Cahill K, Stevens S, Perera R, et al.: Pharmacological interventions for smoking cessation: an overview and network meta-analysis. Cochrane Database Syst Rev 5: CD009329, 2013.23728690
Ray R, Schnoll RA, Lerman C: Pharmacogenetics and smoking cessation with nicotine replacement therapy. CNS Drugs 21 (7): 525-33, 2007.17579497
Fincham JE: Smoking cessation products. In: Covington TR, Berardi RR, Young LL, et al., eds.: Handbook of Nonprescription Drugs. 11th ed. American Pharmaceutical Association, 1996, pp 715-723.
Mills EJ, Wu P, Lockhart I, et al.: Adverse events associated with nicotine replacement therapy (NRT) for smoking cessation. A systematic review and meta-analysis of one hundred and twenty studies involving 177,390 individuals. Tob Induc Dis 8 (1): 8, 2010.20626883
Theodoulou A, Chepkin SC, Ye W, et al.: Different doses, durations and modes of delivery of nicotine replacement therapy for smoking cessation. Cochrane Database Syst Rev 6 (6): CD013308, 2023.37335995
Baker TB, Piper ME, Stein JH, et al.: Effects of Nicotine Patch vs Varenicline vs Combination Nicotine Replacement Therapy on Smoking Cessation at 26 Weeks: A Randomized Clinical Trial. JAMA 315 (4): 371-9, 2016.26813210
Schnoll RA, Patterson F, Wileyto EP, et al.: Effectiveness of extended-duration transdermal nicotine therapy: a randomized trial. Ann Intern Med 152 (3): 144-51, 2010.20124230
Tønnesen P, Paoletti P, Gustavsson G, et al.: Higher dosage nicotine patches increase one-year smoking cessation rates: results from the European CEASE trial. Collaborative European Anti-Smoking Evaluation. European Respiratory Society. Eur Respir J 13 (2): 238-46, 1999.10065662
Hajizadeh A, Howes S, Theodoulou A, et al.: Antidepressants for smoking cessation. Cochrane Database Syst Rev 5 (5): CD000031, 2023.37230961
Jorenby DE, Hays JT, Rigotti NA, et al.: Efficacy of varenicline, an alpha4beta2 nicotinic acetylcholine receptor partial agonist, vs placebo or sustained-release bupropion for smoking cessation: a randomized controlled trial. JAMA 296 (1): 56-63, 2006.16820547
Gonzales D, Rennard SI, Nides M, et al.: Varenicline, an alpha4beta2 nicotinic acetylcholine receptor partial agonist, vs sustained-release bupropion and placebo for smoking cessation: a randomized controlled trial. JAMA 296 (1): 47-55, 2006.16820546
Aubin HJ, Bobak A, Britton JR, et al.: Varenicline versus transdermal nicotine patch for smoking cessation: results from a randomised open-label trial. Thorax 63 (8): 717-24, 2008.18263663
Livingstone-Banks J, Fanshawe TR, Thomas KH, et al.: Nicotine receptor partial agonists for smoking cessation. Cochrane Database Syst Rev 5 (5): CD006103, 2023.37142273
U.S. Food and Drug Administration: Information for Healthcare Professionals: Varenicline (Marketed as Chantix) and Bupropion (Marketed as Zyban, Wellbutrin, and Generics). Rockville, Md: U.S. Food and Drug Administration, 2009. Archived page available online (https://wayback.archive-it.org/7993/20170112032419/http:/www.fda.gov/Drugs/DrugSafety/PostmarketDrugSafetyInformationforPatientsandProviders/DrugSafetyInformationforHeathcareProfessionals/ucm169986.htm). Last accessed February 20, 2025.
Anthenelli RM, Benowitz NL, West R, et al.: Neuropsychiatric safety and efficacy of varenicline, bupropion, and nicotine patch in smokers with and without psychiatric disorders (EAGLES): a double-blind, randomised, placebo-controlled clinical trial. Lancet 387 (10037): 2507-20, 2016.27116918
Thomas KH, Martin RM, Knipe DW, et al.: Risk of neuropsychiatric adverse events associated with varenicline: systematic review and meta-analysis. BMJ 350: h1109, 2015.25767129
Gibbons RD, Mann JJ: Varenicline, smoking cessation, and neuropsychiatric adverse events. Am J Psychiatry 170 (12): 1460-7, 2013.24030388
Cahill K, Stead LF, Lancaster T: Nicotine receptor partial agonists for smoking cessation. Cochrane Database Syst Rev (3): CD006103, 2008.18646137
U.S. Food and Drug Administration: FDA Drug Safety Communication: FDA Revises Description of Mental Health Side Effects of the Stop-Smoking Medicines Chantix (varenicline) and Zyban (bupropion) to Reflect Clinical Trial Findings. U.S. Food and Drug Administration, 2016. Available online (https://www.fda.gov/drugs/drug-safety-and-availability/fda-drug-safety-communication-fda-revises-description-mental-health-side-effects-stop-smoking). Last accessed February 20, 2025.
Singh S, Loke YK, Spangler JG, et al.: Risk of serious adverse cardiovascular events associated with varenicline: a systematic review and meta-analysis. CMAJ 183 (12): 1359-66, 2011.21727225
Benowitz NL, Pipe A, West R, et al.: Cardiovascular Safety of Varenicline, Bupropion, and Nicotine Patch in Smokers: A Randomized Clinical Trial. JAMA Intern Med 178 (5): 622-631, 2018.29630702
Drug Facts and Comparisons. 54th ed. Facts and Comparisons, 2000.
Hughes JR, Stead LF, Hartmann-Boyce J, et al.: Antidepressants for smoking cessation. Cochrane Database Syst Rev 2014 (1): CD000031, 2014.24402784
Hajek P, McRobbie H, Myers K: Efficacy of cytisine in helping smokers quit: systematic review and meta-analysis. Thorax 68 (11): 1037-42, 2013.23404838
Walker N, Howe C, Glover M, et al.: Cytisine versus nicotine for smoking cessation. N Engl J Med 371 (25): 2353-62, 2014.25517706
Oreskovic T, Percac-Lima S, Ashburner JM, et al.: Cytisine Versus Varenicline for Smoking Cessation in a Primary Care Setting: A Randomized Non-inferiority Trial. Nicotine Tob Res 25 (9): 1547-1555, 2023.37291049
Wagena EJ, Knipschild P, Zeegers MP: Should nortriptyline be used as a first-line aid to help smokers quit? Results from a systematic review and meta-analysis. Addiction 100 (3): 317-26, 2005.15733245
Drug Facts and Comparisons. Facts and Comparisons, 1998.
Patnode CD, Henderson JT, Melnikow J, et al.: Interventions for Tobacco Cessation in Adults, Including Pregnant Women: an Evidence Update for the U.S. Preventive Services Task Force. Rockville, Md: Agency for Healthcare Research and Quality, 2021. Also available online (https://www.ncbi.nlm.nih.gov/books/NBK567066/). Last accessed February 20, 2025.
Chang PH, Chiang CH, Ho WC, et al.: Combination therapy of varenicline with nicotine replacement therapy is better than varenicline alone: a systematic review and meta-analysis of randomized controlled trials. BMC Public Health 15: 689, 2015.26198192
Baker TB, Piper ME, Smith SS, et al.: Effects of Combined Varenicline With Nicotine Patch and of Extended Treatment Duration on Smoking Cessation: A Randomized Clinical Trial. JAMA 326 (15): 1485-1493, 2021.34665204
Cinciripini PM, Green CE, Shete S, et al.: Smoking Cessation After Initial Treatment Failure With Varenicline or Nicotine Replacement: A Randomized Clinical Trial. JAMA 331 (20): 1722-1731, 2024.38696203
Nollen NL, Ahluwalia JS, Mayo MS, et al.: Multiple Pharmacotherapy Adaptations for Smoking Cessation Based on Treatment Response in Black Adults Who Smoke: A Randomized Clinical Trial. JAMA Netw Open 6 (6): e2317895, 2023.37338906
Nollen NL, Ahluwalia JS, Sanderson Cox L, et al.: Assessment of Racial Differences in Pharmacotherapy Efficacy for Smoking Cessation: Secondary Analysis of the EAGLES Randomized Clinical Trial. JAMA Netw Open 4 (1): e2032053, 2021.33464316
Ahluwalia JS, McNagny SE, Clark WS: Smoking cessation among inner-city African Americans using the nicotine transdermal patch. J Gen Intern Med 13 (1): 1-8, 1998.9462488
Ebbert JO, Hughes JR, West RJ, et al.: Effect of varenicline on smoking cessation through smoking reduction: a randomized clinical trial. JAMA 313 (7): 687-94, 2015.25688780
Clinical Practice Guideline Treating Tobacco Use and Dependence 2008 Update Panel, Liaisons, and Staff: A clinical practice guideline for treating tobacco use and dependence: 2008 update. A U.S. Public Health Service report. Am J Prev Med 35 (2): 158-76, 2008.18617085
Lindson-Hawley N, Banting M, West R, et al.: Gradual Versus Abrupt Smoking Cessation: A Randomized, Controlled Noninferiority Trial. Ann Intern Med 164 (9): 585-92, 2016.26975007
Lindson-Hawley N, Aveyard P, Hughes JR: Gradual reduction vs abrupt cessation as a smoking cessation strategy in smokers who want to quit. JAMA 310 (1): 91-2, 2013.23821093
Lindson N, Klemperer E, Hong B, et al.: Smoking reduction interventions for smoking cessation. Cochrane Database Syst Rev 9 (9): CD013183, 2019.31565800
Hughes JR, Carpenter MJ: The feasibility of smoking reduction: an update. Addiction 100 (8): 1074-89, 2005.16042638
Batra A, Klingler K, Landfeldt B, et al.: Smoking reduction treatment with 4-mg nicotine gum: a double-blind, randomized, placebo-controlled study. Clin Pharmacol Ther 78 (6): 689-96, 2005.16338284
Etter JF, Laszlo E: Postintervention effect of nicotine replacement therapy for smoking reduction: a randomized trial with a 5-year follow-up. J Clin Psychopharmacol 27 (2): 151-5, 2007.17414237
Hughes JR, Carpenter MJ: Does smoking reduction increase future cessation and decrease disease risk? A qualitative review. Nicotine Tob Res 8 (6): 739-49, 2006.17132521
Thomas R, Perera R: School-based programmes for preventing smoking. Cochrane Database Syst Rev 3: CD001293, 2006.16855966
Peterson AV, Kealey KA, Mann SL, et al.: Hutchinson Smoking Prevention Project: long-term randomized trial in school-based tobacco use prevention--results on smoking. J Natl Cancer Inst 92 (24): 1979-91, 2000.11121460 21063807
Community Intervention Trial for Smoking Cessation (COMMIT): summary of design and intervention. COMMIT Research Group. J Natl Cancer Inst 83 (22): 1620-8, 1991.1749015 92085311
Community Intervention Trial for Smoking Cessation (COMMIT): I. cohort results from a four-year community intervention. Am J Public Health 85 (2): 183-92, 1995.7856777 95160166
Community intervention trial for smoking cessation (COMMIT): II. Changes in adult cigarette smoking prevalence. Am J Public Health 85 (2): 193-200, 1995.7856778 95160167
Popova L, Ling PM: Alternative tobacco product use and smoking cessation: a national study. Am J Public Health 103 (5): 923-30, 2013.23488521
Kamerow D: Big Tobacco lights up e-cigarettes. BMJ 346: f3418, 2013.23709584
Schuster RM, Hertel AW, Mermelstein R: Cigar, cigarillo, and little cigar use among current cigarette-smoking adolescents. Nicotine Tob Res 15 (5): 925-31, 2013.23072873
Jawad M, McEwen A, McNeill A, et al.: To what extent should waterpipe tobacco smoking become a public health priority? Addiction 108 (11): 1873-84, 2013.23863044
Centers for Disease Control and Prevention (CDC): Consumption of cigarettes and combustible tobacco--United States, 2000-2011. MMWR Morb Mortal Wkly Rep 61 (30): 565-9, 2012.22854624
Bullen C, Howe C, Laugesen M, et al.: Electronic cigarettes for smoking cessation: a randomised controlled trial. Lancet 382 (9905): 1629-37, 2013.24029165
National Academies of Sciences, Engineering, and Medicine. Committee on the Review of the Health Effects of Electronic Nicotine Delivery Systems: Public Health Consequences of E-Cigarettes. The National Academies Press, 2018. Also available online (https://www.ncbi.nlm.nih.gov/pubmed/29894118). Last accessed February 20, 2025.
Cullen KA, Gentzke AS, Sawdey MD, et al.: e-Cigarette Use Among Youth in the United States, 2019. JAMA 322 (21): 2095-2103, 2019.31688912
Hajek P, Phillips-Waller A, Przulj D, et al.: A Randomized Trial of E-Cigarettes versus Nicotine-Replacement Therapy. N Engl J Med 380 (7): 629-637, 2019.30699054
Halpern SD, Harhay MO, Saulsgiver K, et al.: A Pragmatic Trial of E-Cigarettes, Incentives, and Drugs for Smoking Cessation. N Engl J Med 378 (24): 2302-2310, 2018.29791259
Nabi-Burza E, Drehmer JE, Hipple Walters B, et al.: Treating Parents for Tobacco Use in the Pediatric Setting: The Clinical Effort Against Secondhand Smoke Exposure Cluster Randomized Clinical Trial. JAMA Pediatr 173 (10): 931-939, 2019.31403675

## Latest Updates to This Summary (02/21/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

This summary was comprehensively reviewed and extensively revised.

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the prevention and cessation of cigarette smoking and the control of tobacco use. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Cigarette Smoking. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/quit-smoking-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389444]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).